# Skin Cancer Screening (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about skin cancer screening. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

Note: The Overview section summarizes the published evidence on this topic. The rest of the summary describes the evidence in more detail.

Other PDQ summaries containing information related to skin cancer screening include the following:

- Skin Cancer Prevention
- Skin Cancer Treatment
- Genetics of Skin Cancer
- Levels of Evidence for Cancer Screening and Prevention Studies

### Interventions

The only widely proposed screening procedure for skin cancer is visual examination of the skin, including both self-examination by the patient and clinical examination by the health care provider. Mobile phone applications that evaluate skin lesions to detect skin cancer and malignant melanoma have been launched.[1] However, the use of such applications to assess skin cancer has been problematic because of the lack of evidence of their diagnostic accuracy and because they have not been studied in large-scale screening programs.[2-4] The use of convolutional neural networks to classify images of melanoma and skin cancer is a growing area of research.[5-7]

### Benefits

There is insufficient evidence that population screening for skin cancer reduces skin cancer mortality. The evidence is inadequate to determine whether visual examination of the skin in asymptomatic individuals leads to a reduction in mortality from melanomatous skin cancer. Further, in asymptomatic populations, the effect of visual skin examination on mortality from nonmelanomatous skin cancers is unknown.

Magnitude of Effect: Unknown.

- Study Design: Direct evidence limited to a single ecological study.
- Internal Validity: Poor.
- Consistency: Not applicable.
- External Validity: Poor.

### Harms

Based on fair—though unquantified—evidence, visual examination of the skin in asymptomatic individuals may lead to adverse consequences. These consequences include complications of diagnostic or treatment interventions (such as poor cosmetic or functional outcomes) and the psychological effects of being labeled with a potentially fatal disease. Other harmful consequences are overdiagnosis, leading to the detection of biologically benign disease that would otherwise go undetected, and possible misdiagnosis of a benign lesion as malignant.

Magnitude of Effect: Unknown.

- Study Design: Case series, ecological studies.
- Internal Validity: Fair.
- Consistency: Fair.
- External Validity: Fair.

### References

Buechi R, Faes L, Bachmann LM, et al.: Evidence assessing the diagnostic performance of medical smartphone apps: a systematic review and exploratory meta-analysis. BMJ Open 7 (12): e018280, 2017.29247099
Kassianos AP, Emery JD, Murchie P, et al.: Smartphone applications for melanoma detection by community, patient and generalist clinician users: a review. Br J Dermatol 172 (6): 1507-1518, 2015.25600815
Wolf JA, Moreau JF, Akilov O, et al.: Diagnostic inaccuracy of smartphone applications for melanoma detection. JAMA Dermatol 149 (4): 422-6, 2013.23325302
Udrea A, Mitra GD, Costea D, et al.: Accuracy of a smartphone application for triage of skin lesions based on machine learning algorithms. J Eur Acad Dermatol Venereol 34 (3): 648-655, 2020.31494983
Hekler A, Utikal JS, Enk AH, et al.: Superior skin cancer classification by the combination of human and artificial intelligence. Eur J Cancer 120: 114-121, 2019.31518967
Esteva A, Kuprel B, Novoa RA, et al.: Dermatologist-level classification of skin cancer with deep neural networks. Nature 542 (7639): 115-118, 2017.28117445
Phillips M, Marsden H, Jaffe W, et al.: Assessment of Accuracy of an Artificial Intelligence Algorithm to Detect Melanoma in Images of Skin Lesions. JAMA Netw Open 2 (10): e1913436, 2019.31617929

## Incidence and Mortality of Skin Cancer

There are two main types of skin cancer:

- Keratinocyte carcinoma.
  - Basal cell carcinoma (BCC).
  - Squamous cell carcinoma (SCC).
- Melanoma.

BCC and SCC are the most common forms of skin cancer but have substantially better prognoses than the less common, generally more aggressive melanoma.

Keratinocyte carcinoma is the most commonly occurring cancer in the United States. Its incidence appears to be increasing in some [1] but not all [2] areas of the United States. Overall U.S. incidence rates have likely been increasing for a number of years.[3,4] At least some of this increase may be attributable to increased skin cancer awareness and resultant increasing investigation and biopsy of skin lesions. A precise estimate of the total number and incidence rate of keratinocyte carcinoma is not possible because reporting to cancer registries is not required. However, it was estimated that in 2012, 5.4 million cases of keratinocyte carcinoma were diagnosed among 3.3 million people in the United States.[5] That number exceeds all other cases of cancer estimated by the American Cancer Society for 2025, which is about 2 million.[5]

Melanoma is reportable in U.S. cancer registries, so there are more reliable estimates of incidence than for keratinocyte carcinoma. In 2025, it is estimated that 104,960 individuals in the United States will be diagnosed with invasive melanoma and 107,240 will be diagnosed with melanoma in situ. Approximately 8,430 individuals will die of melanoma in 2025. Since the early 2000s, melanoma incidence rates among individuals younger than 50 years have stabilized in women but declined by about 1% per year in men. However, among individuals aged 50 years and older in recent years, the incidence rates appeared to have stabilized in men but increased by about 3% per year in women.[5] From 2013 to 2022, melanoma mortality rates declined by about 4% per year and 3% per year in men and women, respectively.[5]

A study of skin biopsy rates in relation to melanoma incidence rates obtained from the Surveillance, Epidemiology, and End Results (SEER) Program of the National Cancer Institute indicated that much of the observed increase in incidence between 1986 and 2001 was confined to local disease and was most likely caused by overdiagnosis as a result of increased skin biopsy rates during this period.[6] A second study that used SEER data between 2002 and 2009 reported similar findings.[7]

The incidence of melanoma also increased in children and adolescents until 2001. However, between 2001 and 2022, there was a 4.3% reduction in the yearly incidence rate of melanoma among children and adolescents in the National Childhood Cancer Registry databases.[8] During that time, the average annual incidence in this group was exceptionally low (4.5 per 1 million), which may have resulted in spurious trends.[8] Nevertheless, similar trends have been seen in Sweden.[9] In the U.S. study of pediatric melanoma, nearly one-half of the patients had local disease (22% of patients had in situ disease, and 25% of patients had superficial spreading), and nearly one-half of the patients had disease with a thickness of less than one millimeter. Given that mortality from pediatric melanoma had been fairly stable during those years,[10] it is likely that the increase in incidence could be explained, at least in part, by overdiagnosis.

### References

Athas WF, Hunt WC, Key CR: Changes in nonmelanoma skin cancer incidence between 1977-1978 and 1998-1999 in Northcentral New Mexico. Cancer Epidemiol Biomarkers Prev 12 (10): 1105-8, 2003.14578151
Harris RB, Griffith K, Moon TE: Trends in the incidence of nonmelanoma skin cancers in southeastern Arizona, 1985-1996. J Am Acad Dermatol 45 (4): 528-36, 2001.11568742
Rogers HW, Weinstock MA, Harris AR, et al.: Incidence estimate of nonmelanoma skin cancer in the United States, 2006. Arch Dermatol 146 (3): 283-7, 2010.20231499
Leiter U, Eigentler T, Garbe C: Epidemiology of skin cancer. Adv Exp Med Biol 810: 120-40, 2014.25207363
American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
Welch HG, Woloshin S, Schwartz LM: Skin biopsy rates and incidence of melanoma: population based ecological study. BMJ 331 (7515): 481, 2005.16081427
Weinstock MA, Lott JP, Wang Q, et al.: Skin biopsy utilization and melanoma incidence among Medicare beneficiaries. Br J Dermatol 176 (4): 949-954, 2017.27639256
National Cancer Institute: NCCR*Explorer: An interactive website for NCCR cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://NCCRExplorer.ccdi.cancer.gov/). Last accessed February 25, 2025.
Austin MT, Xing Y, Hayes-Jordan AA, et al.: Melanoma incidence rises for children and adolescents: an epidemiologic review of pediatric melanoma in the United States. J Pediatr Surg 48 (11): 2207-13, 2013.24210187
Lewis KG: Trends in pediatric melanoma mortality in the United States, 1968 through 2004. Dermatol Surg 34 (2): 152-9, 2008.18093205

## Risk Factors for Skin Cancer

Epidemiological evidence suggests that exposure to UV radiation and the sensitivity of an individual’s skin to UV radiation are risk factors for skin cancer, although the type of exposure (high-intensity and short-duration vs. chronic exposure) and pattern of exposure (continuous vs. intermittent) may differ among the three main types of skin cancer.[1-3] In addition, genetic predisposition and the immune system may play roles in the pathogenesis of skin cancers.[4] Organ-transplant recipients receiving immunosuppressive drugs are at elevated risk of skin cancers, particularly squamous cell carcinoma (SCC). Arsenic exposure also increases the risk of cutaneous SCC.[5,6]

The incidence of melanoma rises rapidly in White individuals after age 20 years. Fair-skinned individuals exposed to the sun are at higher risk. Individuals with certain types of pigmented lesions (dysplastic or atypical nevi), with several large nondysplastic nevi, many small nevi, or moderate freckling have a twofold to threefold increased risk of developing melanoma.[7] Individuals with familial dysplastic nevus syndrome or with several dysplastic or atypical nevi are at high (>fivefold) risk of developing melanoma.[4,7]

It is important to note that, for the general population, most melanomas may not arise from preexisting nevi. A meta-analysis of studies published between 1948 and 2016 found that the prevalence of nevus-associated melanomas was only 29%, compared with 71% for the prevalence of de novo melanomas.[8]

### References

Koh HK: Cutaneous melanoma. N Engl J Med 325 (3): 171-82, 1991.1805813 91270330
Preston DS, Stern RS: Nonmelanoma cancers of the skin. N Engl J Med 327 (23): 1649-62, 1992.1435901 93063090
English DR, Armstrong BK, Kricker A, et al.: Case-control study of sun exposure and squamous cell carcinoma of the skin. Int J Cancer 77 (3): 347-53, 1998.9663594 98326727
Hawkes JE, Truong A, Meyer LJ: Genetic predisposition to melanoma. Semin Oncol 43 (5): 591-597, 2016.27899192
Thomas VD, Aasi SZ, Wilson LD, et al.: Cancer of the skin. In: DeVita VT Jr, Hellman S, Rosenberg SA, eds.: Cancer: Principles and Practice of Oncology. Vols. 1 & 2. 8th ed. Lippincott Williams & Wilkins, 2008, pp 1863-87.
Le Mire L, Hollowood K, Gray D, et al.: Melanomas in renal transplant recipients. Br J Dermatol 154 (3): 472-7, 2006.16445778
Gandini S, Sera F, Cattaruzza MS, et al.: Meta-analysis of risk factors for cutaneous melanoma: I. Common and atypical naevi. Eur J Cancer 41 (1): 28-44, 2005.15617989
Pampena R, Kyrgidis A, Lallas A, et al.: A meta-analysis of nevus-associated melanoma: Prevalence and practical implications. J Am Acad Dermatol 77 (5): 938-945.e4, 2017.28864306

## Accuracy of Making a Clinical Diagnosis of Melanoma

Observer variability among physicians has been noted in the evaluation of skin lesions and subsequent biopsy specimens. A systematic review of 32 studies that compared the accuracy of dermatologists and primary care physicians in making a clinical diagnosis of melanoma concluded that there was no statistically significant difference in accuracy. However, the results were inconclusive, owing to small sample sizes and study design weaknesses.[1] Subsequent studies have noted a higher accuracy for dermatologists in the diagnosis of melanocytic lesions,[2,3] yet there is a shortage of dermatologists to meet the demands of population-level screening.

A study of 187 pathologists who practiced in the United States found that cases of moderately dysplastic nevi to early-stage invasive melanoma had less than 50% agreement with a reference diagnosis defined by consensus of experienced pathologists.[4] At a U.S. population level, it is estimated that 82.8% (95% confidence interval, 81.0%–84.5%) of melanocytic skin biopsy diagnoses would be verified if they were reviewed by a consensus reference panel of experienced pathologists.[4] In addition, differentiating between benign and malignant melanocytic tumors during histological examinations of biopsy specimens has been shown to be inconsistent, even in the hands of experienced dermatopathologists.[5,6] This variability in the diagnosis of melanocytic lesions undermines the results of studies that examine screening effectiveness and also may undermine the effectiveness of any screening intervention. Furthermore, this finding suggests that requesting a second opinion regarding the pathology of biopsy specimens may be important.[5-7] A standardized approach to pathologists’ classifying of the interpretations of melanocytic skin lesions may also reduce confusion and improve communication between clinicians.[4,6,8,9]

### References

Chen SC, Bravata DM, Weil E, et al.: A comparison of dermatologists' and primary care physicians' accuracy in diagnosing melanoma: a systematic review. Arch Dermatol 137 (12): 1627-34, 2001.11735713
Chen SC, Pennie ML, Kolm P, et al.: Diagnosing and managing cutaneous pigmented lesions: primary care physicians versus dermatologists. J Gen Intern Med 21 (7): 678-82, 2006.16808765
Corbo MD, Wismer J: Agreement between dermatologists and primary care practitioners in the diagnosis of malignant melanoma: review of the literature. J Cutan Med Surg 16 (5): 306-10, 2012 Sep-Oct.22971304
Elmore JG, Barnhill RL, Elder DE, et al.: Pathologists' diagnosis of invasive melanoma and melanocytic proliferations: observer accuracy and reproducibility study. BMJ 357: j2813, 2017.28659278
Farmer ER, Gonin R, Hanna MP: Discordance in the histopathologic diagnosis of melanoma and melanocytic nevi between expert pathologists. Hum Pathol 27 (6): 528-31, 1996.8666360 96251214
Lott JP, Elmore JG, Zhao GA, et al.: Evaluation of the Melanocytic Pathology Assessment Tool and Hierarchy for Diagnosis (MPATH-Dx) classification scheme for diagnosis of cutaneous melanocytic neoplasms: Results from the International Melanoma Pathology Study Group. J Am Acad Dermatol 75 (2): 356-63, 2016.27189823
Piepkorn MW, Longton GM, Reisch LM, et al.: Assessment of Second-Opinion Strategies for Diagnoses of Cutaneous Melanocytic Lesions. JAMA Netw Open 2 (10): e1912597, 2019.31603483
Piepkorn MW, Barnhill RL, Elder DE, et al.: The MPATH-Dx reporting schema for melanocytic proliferations and melanoma. J Am Acad Dermatol 70 (1): 131-41, 2014.24176521
Radick AC, Reisch LM, Shucard HL, et al.: Terminology for melanocytic skin lesions and the MPATH-Dx classification schema: A survey of dermatopathologists. J Cutan Pathol 48 (6): 733-738, 2021.32935869

## Evidence of Benefit Associated With Screening

More than 90% of melanomas that arise in the skin can be recognized with the naked eye. Very often there is a prolonged horizontal growth phase, during which the tumor expands centrifugally beneath the epidermis but does not invade the underlying dermis. This horizontal growth phase may provide lead time for early detection. Melanoma is more easily cured if treated before the onset of the vertical growth phase with its metastatic potential.[1]

The probability of tumor recurrence within 10 years after curative resection is less than 10% with tumors less than 1.4 mm in thickness. For patients with tumors less than 0.76 mm in thickness, the likelihood of recurrence is less than 1% in 10 years.[2]

A systematic review of skin cancer screening examined evidence available through mid-2005. The review concluded that direct evidence of improved health outcomes associated with skin cancer screening is lacking.[3] An updated review published in 2016 found limited evidence that skin cancer screening reduces melanoma mortality.[4,5]

No randomized trials evaluating the efficacy of skin cancer screening on mortality have been completed. A population-based trial (using cluster randomization) to determine the effect of skin cancer screening on melanoma mortality was initiated in Queensland, Australia, but lost its funding after the initial pilot phase, and no health outcomes were ever reported.[6]

Two ecological studies have been conducted using data from Germany. The first study was a pilot project conducted in 2003 and 2004, in which a skin cancer screening program was implemented in one federal state. Suggestion of a reduction in melanoma mortality with screening led to the establishment of countywide skin cancer screening programs in 2008.[7,8] The programs offered a whole-body skin examination once every 2 years for individuals older than 35 years. The second ecological study compared the melanoma mortality experience in Germany with the melanoma mortality experience of subregions of 22 European countries—none of which had organized screening programs—for the years 2000 to 2013. After adjustment for potential confounders, Germany and the 22 European regions had similar malignant mortality rates, suggesting no benefit of screening.[9]

### References

Friedman RJ, Rigel DS, Kopf AW: Early detection of malignant melanoma: the role of physician examination and self-examination of the skin. CA Cancer J Clin 35 (3): 130-51, 1985 May-Jun.3921200 85176248
Blois MS, Sagebiel RW, Abarbanel RM, et al.: Malignant melanoma of the skin. I. The association of tumor depth and type, and patient sex, age, and site with survival. Cancer 52 (7): 1330-41, 1983.6883293 83284790
Wolff T, Tai E, Miller T: Screening for skin cancer: an update of the evidence for the U.S. Preventive Services Task Force. Ann Intern Med 150 (3): 194-8, 2009.19189909
Wernli KJ, Henrikson NB, Morrison CC, et al.: Screening for Skin Cancer in Adults: Updated Evidence Report and Systematic Review for the US Preventive Services Task Force. JAMA 316 (4): 436-47, 2016.27458949
Bibbins-Domingo K, Grossman DC, Curry SJ, et al.: Screening for Skin Cancer: US Preventive Services Task Force Recommendation Statement. JAMA 316 (4): 429-35, 2016.27458948
Aitken JF, Elwood JM, Lowe JB, et al.: A randomised trial of population screening for melanoma. J Med Screen 9 (1): 33-7, 2002.11943795
Katalinic A, Waldmann A, Weinstock MA, et al.: Does skin cancer screening save lives? An observational study comparing trends in melanoma mortality in regions with and without screening. Cancer 118 (21): 5395-402, 2012.22517033
Eisemann N, Waldmann A, Holleczek B, et al.: Observed and expected mortality in the German skin cancer screening pilot project SCREEN. J Med Screen 25 (3): 166-168, 2018.29169295
Kaiser M, Schiller J, Schreckenberger C: The effectiveness of a population-based skin cancer screening program: evidence from Germany. Eur J Health Econ 19 (3): 355-367, 2018.28353004

## Evidence of Harms Associated With Screening

Harms have not been well studied or reported in quantitative terms, but the potential for adverse consequences from skin cancer screening exists. In the SCREEN pilot project in Germany, 4.4% of all screened participants underwent a skin excision for a suspicious lesion, but most biopsies did not result in a cancer diagnosis. The detection rate was especially affected by age. One case of melanoma was detected per 28 excisions overall (for both men and women), while 52 skin excisions were required to detect one melanoma in men aged 20 to 34 years.[1]

Visual examination of the skin in asymptomatic individuals may lead to cosmetic or functional complications of diagnostic or treatment interventions and psychological effects of being labeled with a potentially fatal disease. However, robust data on the frequency of such events are lacking. Other harmful consequences are overdiagnosis, leading to the detection of biologically benign disease that would otherwise go undetected,[2-4] and possible misdiagnosis of a benign lesion as malignant. For more information, see the Accuracy of Making a Clinical Diagnosis of Melanoma section.

### References

Waldmann A, Nolte S, Geller AC, et al.: Frequency of excisions and yields of malignant skin tumors in a population-based screening intervention of 360,288 whole-body examinations. Arch Dermatol 148 (8): 903-10, 2012.22911184
Welch HG, Woloshin S, Schwartz LM: Skin biopsy rates and incidence of melanoma: population based ecological study. BMJ 331 (7515): 481, 2005.16081427
Weinstock MA, Lott JP, Wang Q, et al.: Skin biopsy utilization and melanoma incidence among Medicare beneficiaries. Br J Dermatol 176 (4): 949-954, 2017.27639256
Schoffer O, Schülein S, Arand G, et al.: Tumour stage distribution and survival of malignant melanoma in Germany 2002-2011. BMC Cancer 16 (1): 936, 2016.27919243

## Latest Updates to This Summary (05/09/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Incidence and Mortality of Skin Cancer

Added American Cancer Society as reference 5.

Updated statistics with estimated new cases of melanoma and melanoma in situ and deaths due to melanoma for 2025. Also revised text to state that from 2013 to 2022, melanoma mortality rates declined by about 4% per year and 3% per year in men and women, respectively.

This summary is written and maintained by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about skin cancer screening. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Screening and Prevention Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Screening and Prevention Editorial Board. PDQ Skin Cancer Screening. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/skin/hp/skin-screening-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389300]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).